# Cognitive Impairment in Adults With Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cognitive impairment in adults with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Cognitive Impairment in Cancer Survivors

Cancer survivors report more symptoms of cognitive impairment than people without a history of cancer.[1] Formal neuropsychological testing demonstrates a range of objective cognitive deficits in some but not all survivors who report symptoms, compared with healthy controls. These deficits include the following: [1-3]

- Impaired memory.
- Reduced concentration.
- Slower information processing.
- Reduced executive function.

Subjective reports of cognitive impairment often do not correlate with the results of formal neuropsychological testing.[4,5] In addition, the risk factors for subjective or objective cognitive impairment—such as age, preexisting cognitive function, type of cancer, type of chemotherapy, and the natural history of the impairments—remain a matter of active investigation.

The oncology clinician who cares for survivors with objective or subjective cognitive impairment is advised to consider the following:

- Because abnormal is defined as a significant deviation from population means, formal neuropsychological testing may be insensitive to subtle changes in cognitive function since cancer diagnosis or treatment.
- There is a strong correlation between a patient's subjective reports of cognitive impairment and decreased daily functioning [6] or reduced quality of life.[7]
- It is not known whether cognitive impairment influences or is a sign of psychological distress.[4] However, one study of 226 participants (166 patients with newly diagnosed breast cancer and 60 controls) demonstrated that patients with breast cancer scored consistently worse than controls on cognitive tests. This decline was mediated by post-traumatic stress disorder (PTSD), indicating that PTSD may contribute in part to cognitive decline.[8] Studies have also shown that cognitive impairment is associated with negative emotional states such as anxiety and depression,[6,9,10] the personality trait of negative affectivity,[11] and self-perceived treatment burden.[9]
- Treatments for patients with cancer-related cognitive impairment have shown minimal to modest benefit. For clinicians, compassionate acknowledgment of a patient's concerns and a supportive approach are essential.

### References

Jean-Pierre P, Winters PC, Ahles TA, et al.: Prevalence of self-reported memory problems in adult cancer survivors: a national cross-sectional study. J Oncol Pract 8 (1): 30-4, 2012.22548008
Vardy JL, Dhillon HM, Pond GR, et al.: Cognitive Function in Patients With Colorectal Cancer Who Do and Do Not Receive Chemotherapy: A Prospective, Longitudinal, Controlled Study. J Clin Oncol 33 (34): 4085-92, 2015.26527785
Scherwath A, Schirmer L, Kruse M, et al.: Cognitive functioning in allogeneic hematopoietic stem cell transplantation recipients and its medical correlates: a prospective multicenter study. Psychooncology 22 (7): 1509-16, 2013.22945857
Pullens MJ, De Vries J, Roukema JA: Subjective cognitive dysfunction in breast cancer patients: a systematic review. Psychooncology 19 (11): 1127-38, 2010.20020424
Hutchinson AD, Hosking JR, Kichenadasse G, et al.: Objective and subjective cognitive impairment following chemotherapy for cancer: a systematic review. Cancer Treat Rev 38 (7): 926-34, 2012.22658913
Shilling V, Jenkins V: Self-reported cognitive problems in women receiving adjuvant therapy for breast cancer. Eur J Oncol Nurs 11 (1): 6-15, 2007.16844416
Von Ah D, Habermann B, Carpenter JS, et al.: Impact of perceived cognitive impairment in breast cancer survivors. Eur J Oncol Nurs 17 (2): 236-41, 2013.22901546
Hermelink K, Bühner M, Sckopke P, et al.: Chemotherapy and Post-traumatic Stress in the Causation of Cognitive Dysfunction in Breast Cancer Patients. J Natl Cancer Inst 109 (10): , 2017.28521364
Hermelink K, Küchenhoff H, Untch M, et al.: Two different sides of 'chemobrain': determinants and nondeterminants of self-perceived cognitive dysfunction in a prospective, randomized, multicenter study. Psychooncology 19 (12): 1321-8, 2010.20127909
Hermelink K, Untch M, Lux MP, et al.: Cognitive function during neoadjuvant chemotherapy for breast cancer: results of a prospective, multicenter, longitudinal study. Cancer 109 (9): 1905-13, 2007.17351951
Watson D, Pennebaker JW: Health complaints, stress, and distress: exploring the central role of negative affectivity. Psychol Rev 96 (2): 234-54, 1989.2710874

## Normal Cognition

Cognition is the mental process of acquiring knowledge and understanding through thought, experience, and the senses. The six domains of cognitive function summarized below were proposed in the Diagnostic and Statistical Manual of Mental Disorders, 5th edition, to help establish the etiology and severity of neurocognitive disorders.[1]

- Attention and concentration: Ability to triage relevant information, thoughts, and actions while ignoring distractions; the ability to maintain attention for an extended period of time.
- Executive function: Ability to initiate and generate hypotheses, to plan, and to make decisions.
- Information processing speed: Ability to quickly and efficiently process information.
- Visuospatial skill: Ability to process and interpret visual information about where things are in space.
- Language: Ability to understand and communicate symbolic information, both verbally and in writing.
- Learning and memory: Ability to learn new information; ability to store and recall new information, in either the short term or the long term.

The domains are interdependent, and any proposed taxonomy is provisional and will depend on the specific neuropsychological tests used to assess patients. Furthermore, published studies vary in terms of the cutoff for impairment and which scales are combined into a single score. While the domains reasonably capture the range of concerns experienced by people with cancer, it is important to clarify the specific impairment through a careful history and formal testing. In addition, comparisons between studies are hampered by different scales and definitions.

### References

Sachdev PS, Blacker D, Blazer DG, et al.: Classifying neurocognitive disorders: the DSM-5 approach. Nat Rev Neurol 10 (11): 634-42, 2014.25266297

## Responding to Patient Reports of Cognitive Impairment

Patients with cancer may experience the following cognitive difficulties:

- Difficulty multitasking; must focus on one thing at a time.
- Trouble concentrating; inability to focus on tasks.
- Memory lapses.
- Difficulty following instructions.
- Decreased ability to handle personal finances.
- Disorganized behavior or thinking.
- Loss of initiative.
- Difficulty remembering common words and recalling names.
- Inability to recognize familiar objects.
- Altered perception.
- Difficulty finding words.

Before a patient is referred for formal neuropsychological testing, the oncology clinician can perform a complete assessment of the potential contribution of medications and medical comorbidities to the patient’s experience. It is well established that preexisting illness may contribute to cognitive impairment before a patient is diagnosed with or treated for cancer.[1] Patients who report symptoms or concerns suggestive of cognitive impairment may benefit from an evaluation of potentially reversible causes and appropriate measures. Potential contributing factors include the following:

- Advanced age.
- Frailty.[2,3]
- Certain medications and their side effects.
- Hormone status and menopause status.
- Emotional distress and/or depressive symptoms and anxiety.
- Symptoms such as pain, fatigue, and sleep disturbance.[4][Level of evidence: II]
- Comorbidities.
- Use of alcohol or other agents that alter cognition.
- Higher stage of disease, larger tumor size, and markers of tumor aggressivity (e.g., HER2 positivity in breast cancer).[5]
- Increased levels of C-reactive protein or other proinflammatory cytokines (e.g., interleukin 6).[6,7]

### Validation of the Survivor Experience

The experience of cognitive changes after cancer treatment has been documented in qualitative research.[8-11] Concerns reported by survivors include the following: [8]

- Memory problems.
- Inability to concentrate.
- Decreased ability to function in daily activities, including employment.

Survivors expressed frustration with health care providers' lack of acknowledgment of their cognitive changes; they also expressed the need to be informed early about the possibility of developing this problem.[9,10] Patients found it comforting that subtle mental changes have been observed widely in cancer survivors and are to be expected. The least helpful response by practitioners was minimizing the changes or not taking them seriously.[9]

### Evaluation of Subjective Reports of Cognitive Impairment

As with all patient-reported symptoms and signs, a thorough evaluation will help determine the cause of cognitive impairment and potential interventions to reverse the symptoms or stabilize the patient. A focused history and physical examination can assess the following:

- Measures of baseline cognitive function, such as educational attainment, job-related responsibilities, and premorbid functioning.
- Potential risk factors for cognitive impairment such as advanced age, type and stage of cancer, and treatment history, including time since last treatment and drugs used in treatment.
- Use or misuse of prescription and over-the-counter medications and supplements.
- Focal neurological deficits. Focal motor defects or discrete cortical defects such as aphasia or apraxia are uncommon in cancer-associated cognitive impairment.[12]
- Signs of metastatic disease to the brain, meninges, or both.

The routine use of neuroimaging is not warranted unless there are concerns about specific complications from the cancer or its treatment (e.g., metastatic cancer to the brain).

### References

Mandelblatt JS, Stern RA, Luta G, et al.: Cognitive impairment in older patients with breast cancer before systemic therapy: is there an interaction between cancer and comorbidity? J Clin Oncol 32 (18): 1909-18, 2014.24841981
Mandelblatt JS, Jacobsen PB, Ahles T: Cognitive effects of cancer systemic therapy: implications for the care of older patients and survivors. J Clin Oncol 32 (24): 2617-26, 2014.25071135
Mandelblatt JS, Clapp JD, Luta G, et al.: Long-term trajectories of self-reported cognitive function in a cohort of older survivors of breast cancer: CALGB 369901 (Alliance). Cancer 122 (22): 3555-3563, 2016.27447359
Huang V, Mackin L, Kober KM, et al.: Distinct sleep disturbance and cognitive dysfunction profiles in oncology outpatients receiving chemotherapy. Support Care Cancer 30 (11): 9243-9254, 2022.36066629
Root JC, Zhou X, Ahn J, et al.: Association of markers of tumor aggressivity and cognition in women with breast cancer before adjuvant treatment: The Thinking and Living with Cancer Study. Breast Cancer Res Treat 194 (2): 413-422, 2022.35587324
Mandelblatt JS, Small BJ, Zhou X, et al.: Plasma levels of interleukin-6 mediate neurocognitive performance in older breast cancer survivors: The Thinking and Living With Cancer study. Cancer 129 (15): 2409-2421, 2023.37096888
Carroll JE, Nakamura ZM, Small BJ, et al.: Elevated C-Reactive Protein and Subsequent Patient-Reported Cognitive Problems in Older Breast Cancer Survivors: The Thinking and Living With Cancer Study. J Clin Oncol 41 (2): 295-306, 2023.36179271
Myers JS: Chemotherapy-related cognitive impairment: the breast cancer experience. Oncol Nurs Forum 39 (1): E31-40, 2012.22201666
Boykoff N, Moieni M, Subramanian SK: Confronting chemobrain: an in-depth look at survivors' reports of impact on work, social networks, and health care response. J Cancer Surviv 3 (4): 223-32, 2009.19760150
Von Ah D, Habermann B, Carpenter JS, et al.: Impact of perceived cognitive impairment in breast cancer survivors. Eur J Oncol Nurs 17 (2): 236-41, 2013.22901546
Munir F, Burrows J, Yarker J, et al.: Women's perceptions of chemotherapy-induced cognitive side affects on work ability: a focus group study. J Clin Nurs 19 (9-10): 1362-70, 2010.20500346
Wefel JS, Witgert ME, Meyers CA: Neuropsychological sequelae of non-central nervous system cancer and cancer therapy. Neuropsychol Rev 18 (2): 121-31, 2008.18415683

## Proactive Approaches to Cognitive Impairment

In addition to responding respectfully and compassionately to patients’ concerns about cognitive impairment, the oncology clinician faces questions on how best to inform patients about the risks of cognitive impairment and whether to screen all patients routinely or limit screening to patients at higher risk.

### Education About the Risk of Cognitive Impairment

In-depth interviews with cancer survivors revealed that few materials were available to educate them about cognitive problems.[1] The amount of information desired by survivors varied from extensive to brief and general.[2] The optimal method of information delivery was also not clear. Patients and survivors described feeling overwhelmed by the amount of written information about treatment and side effects that they received. Some patients expressed the desire to discuss their preferred method of learning with a health care provider who would provide information in a relaxed, unhurried manner.

One study examined the influence of priming patients to associate chemotherapy treatment with cognitive impairment. Via cancer websites, investigators recruited 150 patients with cancer who were receiving or had received chemotherapy and 86 patients who had no experience with chemotherapy to participate in a study on the effects of cancer therapies on individual patients.[3] Volunteers were randomly assigned to receive a neutral introduction or a priming introduction that stated “some patients treated with chemotherapy experience cognitive problems.”

The study found an association between priming and having had chemotherapy. Patients who had chemotherapy and received the priming introduction reported higher levels of cognitive impairment than those who received the neutral introduction. No difference was found for patients not treated with chemotherapy.[3] The volunteers were highly aware of the relationship between chemotherapy and cognitive impairment, but preexisting knowledge of that relationship had no effect on self-reported cognitive complaints and neuropsychological test performance. These study results raise the possibility that the test environment introduced an artifact.

The optimal means and content for educating patients about cognitive impairment are not established. The principle of informed consent applies: the oncology clinician must inform patients of the risk in a manner that respects personal autonomy.

### Screening

No large-scale studies of routine screening for cognitive impairment in people with cancer have been published. In the clinical setting, the Mini-Mental State Exam is often used to assess for cognitive impairment [4] but has varying sensitivities of mild cognitive impairment.[5] The National Comprehensive Cancer Network has identified a series of questions and probes to screen for cognitive impairment and rule out other concerns (e.g., depression or sleep disturbances) that can be treated.[6] One challenge in screening for cognitive impairment is the lack of a brief measure that can accurately assess the multiple cognitive domains.[7] Patient-reported outcome scales (e.g., the Patient-Reported Outcomes Measurement Information System [PROMIS] 8-item and 4-point scales and the Functional Assessment of Cancer Therapy—Cognitive [FACT-Cog] version 3) might prove valuable, but further study is required. PROMIS has two scales based on the FACT-cog, including perceived cognitive impairment and perceived cognitive abilities, which measure different dimensions of cognitive impairment.

An additional challenge is the timing of screening activities, given the variable time to onset and the resolution of concerns without intervention for many patients.

### References

Myers JS: Chemotherapy-related cognitive impairment: the breast cancer experience. Oncol Nurs Forum 39 (1): E31-40, 2012.22201666
Boykoff N, Moieni M, Subramanian SK: Confronting chemobrain: an in-depth look at survivors' reports of impact on work, social networks, and health care response. J Cancer Surviv 3 (4): 223-32, 2009.19760150
Schagen SB, Das E, Vermeulen I: Information about chemotherapy-associated cognitive problems contributes to cognitive problems in cancer patients. Psychooncology 21 (10): 1132-5, 2012.21769988
Folstein MF, Folstein SE, McHugh PR: "Mini-mental state". A practical method for grading the cognitive state of patients for the clinician. J Psychiatr Res 12 (3): 189-98, 1975.1202204 76071605
Mitchell AJ: A meta-analysis of the accuracy of the mini-mental state examination in the detection of dementia and mild cognitive impairment. J Psychiatr Res 43 (4): 411-31, 2009.18579155
Denlinger CS, Ligibel JA, Are M, et al.: Survivorship: cognitive function, version 1.2014. J Natl Compr Canc Netw 12 (7): 976-86, 2014.24994918
Wefel JS, Vardy J, Ahles T, et al.: International Cognition and Cancer Task Force recommendations to harmonise studies of cognitive function in patients with cancer. Lancet Oncol 12 (7): 703-8, 2011.21354373

## Research Studies on the Prevalence, Risk Factors, and Natural History of Cognitive Impairment

This section summarizes the key findings of meta-analyses, systematic reviews, and individual studies of cognitive impairment.

The International Cognition and Cancer Task Force (ICCTF) has identified several methodological differences or shortcomings in published studies:[1,2]

- Whether patients enrolled in the study had presented with subjective concerns or were recruited to undergo formal testing.
- Assessment of pretreatment cognitive impairment and interstudy differences in how baseline function was accounted for.
- Variations in objective neuropsychological testing, including instruments selected, definitions of cognitive domains, and definition of impairment.

The ICCTF has recommended that investigators define a priori cognitive end points, use a core of validated neuropsychological tests, adopt common criteria for cognitive impairment, employ a longitudinal design, and use a control population.[1,2]

### Meta-Analyses and Systematic Reviews

#### Subjective cognitive concerns in patients with breast cancer

One group of researchers identified 27 studies of subjective cognitive impairment in patients with breast cancer that were published between 1960 and April 2009.[3] Only eight studies were high quality. The percentage of patients reporting subjective concerns ranged from 21% to 90%. There was no correlation between subjective concerns and objective findings, and no conclusive information about timing and the contribution of disease versus treatment received.

Subjective concerns were related to health status, fatigue, and psychological distress. The authors pointed out that those subjective concerns may be a marker of anxiety or depression rather than objective cognitive impairment.[3]

In another study of 212 mostly female breast cancer survivors, fatigue and stress were more important than demographic and medical characteristics in self-reported cognitive impairment, whereas other characteristics such as age, smoking history, and number of chemotherapy cycles were more important in objective cognitive impairment in the linear regression models. This finding emphasizes the need to address psychological problems in cancer survivors reporting cognitive impairment.[4]

#### Relationship between subjective concerns and objective findings

A comprehensive screen for studies comparing rates of subjective cognitive concerns and objective cognitive impairment published between 1980 and 2012 yielded 24 studies.[5] Only 8 of the 24 studies demonstrated a significant correlation, and 6 of these involved patients with breast cancer. The authors pointed out that the lack of correlation may be due to methodological differences (e.g., different assessment methods, different definitions of significant impairment) or the possibility that subjective concerns are a sign of psychological distress.

#### Cognitive impairment in breast cancer survivors

A group of investigators performed a meta-analysis of data from studies that reported the results of neuropsychological tests in women with breast cancer who were treated for more than 6 months before the study.[6] The investigators identified 17 studies with 807 patients; the mean time since completion of chemotherapy was 2.9 years. Weighted average effect sizes for the studied cognitive domains demonstrated modest impairment in verbal ability (effect size, –0.19; 95% confidence interval [CI], –0.30 to –0.07; P = .002) and visuospatial ability (effect size, –0.27; 95% CI, –0.45 to –0.08; P = .006).

#### Chemotherapy and cognitive impairment in patients with cancer

A group of researchers calculated effect sizes based on data from 13 high-quality studies published in 2010 and earlier.[7] Key criteria for study inclusion were reports with primary data, statistics to allow calculation of effect sizes, and a control group; studies with patients who had psychological distress were excluded.

Although several domains were affected, the effect sizes were small. The affected domains included:

- Executive function (effect size, –0.27).
- Memory (effect size, –0.21).
- Verbal function and language skills (effect size, –0.17).

Insignificant effect sizes were observed for the following:

- Construction (the ability to draw and build).
- Concept formation.
- Reasoning.
- Perception.
- Orientation and attention.

The authors noted a consistent but not universal trend of worse performance by patients who received chemotherapy compared with groups who received other types of treatment, received no treatment, or were healthy. Furthermore, longer time in treatment was associated with increased cognitive impairment, and longer time since completion of treatment was associated with cognitive improvement.[7]

#### Subjective and objective cognitive deficits in breast cancer survivors receiving endocrine therapy

Researchers identified 12 high-quality studies (including 2,756 patients) published between 1966 and 2015 that examined the impact of endocrine therapy on cognitive functioning.[8] Study eligibility criteria included all prospective and retrospective observational cohort studies and randomized controlled trials that reported the impact of endocrine therapy, including selective estrogen modulators and aromatase inhibitors, on cognitive performance. Cognitive assessments were examined in breast cancer patients over time, from baseline to 6 months to 1 year and/or 2 years.

Treatment with endocrine therapy was accompanied by deficits in verbal memory, verbal fluency, motor speed, attention, and working memory, but not psychomotor speed. However, findings were limited by the methodical heterogeneity of included studies and relatively short follow-up periods (3 months to 2 years).

In the TAILORx trial, 454 women diagnosed with breast cancer were randomly assigned to receive chemotherapy plus endocrine therapy (n = 218) or endocrine therapy alone (n = 236). They also completed the Functional Assessment of Cancer Therapy (FACT)—Cognitive Function-Perceived Cognitive Impairment (FACT-Cog PCI) to assess perceived cognitive function at baseline (pretreatment) and at 3, 6, 12, 24, and 36 months.[9][Level of evidence: I] The FACT-Cog PCI subscale is a well-known, sensitive measure of perceived cognitive impairment and has an empirical-derived, clinically meaningful change score (PCI cutoff, ˃ 0.5) to assess cognitive impairment. In this study, breast cancer survivors in both groups reported significantly poorer perceived cognitive function at 3, 6, 12, 24, and 36 months compared with baseline. Breast cancer survivors who received chemotherapy plus endocrine therapy had statistically significant and clinically meaningful change in perceived cognitive impairment at 3 and 6 months, compared with those who received endocrine therapy alone, but this difference abated over time. The findings suggest that chemotherapy provides early but not sustained contribution to perceived cognitive impairment, indicating that the underlying etiology may be more multifaceted than just chemotherapy use. In addition, since both groups experienced significant perceived cognitive impairment compared with baseline, more studies are needed in the clinical assessment and management of perceived cognitive impairment over the treatment trajectory.

In the Tamoxifen and Exemestane Adjuvant Multinational Trial, breast cancer survivors received 5 years of exemestane treatment (n = 114) or sequential treatment of 2.5 years of tamoxifen treatment, followed by 2.5 years of exemestane treatment (n = 92).[10] Neuropsychological performance was assessed before endocrine therapy, after 1 year (short-term [ST] follow-up), and at 5 years (long-term [LT] follow-up). A control group of 120 healthy participants were assessed with parallel intervals. After controlling for age, intelligence quotient, attrition, menopausal symptoms, anxiety and/or depression, and fatigue, the sequential group showed ST and LT decline, compared with control participants, on verbal memory (effect size [ES] = 0.26, P = .01; ES = 0.34, P =.003) and executive function (ES = 0.27, P =.007; ES = 0.38, P = .002). In addition, compared with the exemestane group, the sequential group demonstrated ST decline on information processing speed (ES = 0.33, P = .01) and executive function (ES = 0.32, P = .01) and LT decline on verbal memory (ES = 0.33, P = .02). The exemestane group showed no cognitive decline compared with control participants. The apparent cognitive adverse effects of tamoxifen alone and after switching to exemestane suggested that tamoxifen may have a carryover cognitive effect.[10] These findings, if confirmed, suggest that tamoxifen may have more adverse cognitive effects than exemestane.

#### Objective cognitive deficits in men with prostate cancer receiving androgen deprivation therapy (ADT)

Researchers identified 14 high-quality studies among 157 potentially relevant articles published between 1950 and 2012 by searching PubMed, Medline, PsycINFO, Cochrane Library, and Web of Knowledge/Science.[11] Criteria for study inclusion were an appropriate control group, baseline measurements, and the use of objective neuropsychological tests. Eleven studies were longitudinal; the authors included three cross-sectional studies.

The only significant effect detected was for visuomotor ability. There were no discernible negative effects on the other domains studied, which included the following:[11]

- Attention/working memory.
- Executive functioning.
- Language.
- Verbal memory.
- Visual memory.
- Visuospatial ability.

### Individual Research Studies

#### Neuropsychological tests of patients with early-stage breast cancer receiving adjuvant treatment

Several studies are relevant to an understanding of cognitive impairment in women with early-stage breast cancer who receive chemotherapy.

Using a battery of neuropsychological and psychological tests, investigators assessed healthy controls and women with early-stage breast cancer who were treated with chemotherapy (n = 60) or who did not receive chemotherapy (n = 72), before treatment and again at 1, 6, and 18 months.[12] The primary outcome of interest was processing speed. Results demonstrated that women aged 60 years or older with lower baseline cognitive reserve who received chemotherapy scored lower on processing speed than did healthy controls or women who did not receive chemotherapy. These results are consistent with results from studies of aging.[13] There was also an effect on verbal ability that resolved by 6 months. There were no demonstrable interactions between time, age, and cognitive reserve for the following:[12]

- Verbal memory.
- Visual memory.
- Working memory.
- Sorting.
- Distractibility.
- Reaction time.

Another group of investigators performed neuropsychological assessments for 60 women younger than 66 years who had early-stage breast cancer.[14] The subjects were tested before and after each cycle of adjuvant chemotherapy. The goal was to determine whether there was progressive decline suggesting a dose-response relationship. A control cohort of 60 healthy women matched for age and education was tested at appropriate intervals. The authors observed a dose-related decline in the following:[14]

- Working memory.
- Processing speed.
- Verbal memory.
- Visual memory.

#### Subjective reports by patients with early-stage breast cancer receiving adjuvant treatment

Investigators compared subjective cognitive functioning (measured by the Cognitive Failures Questionnaire) and satisfaction with subjective cognitive functioning (measured with the cognitive functioning facet of the World Health Organization Quality of Life instrument) at two times in women with breast cancer—before chemotherapy and 3 months later—and at comparable times in women with benign breast disease.[15] The frequency of subjective concerns did not differ, but women with breast cancer were less satisfied with their cognitive functioning. Psychological factors and diagnosis influenced satisfaction with cognitive functioning.

#### Self-reported neurocognitive symptoms in women with breast cancer

Investigators conducted a longitudinal study of 581 patients with breast cancer recruited from community cancer clinics and age-matched controls.[16] Patients and controls completed the Functional Assessment of Cancer Therapy—Cognitive Function (FACT-Cog) before receiving chemotherapy, 4 weeks postchemotherapy, and 6 months after the second assessment. Controls were tested within the same time windows as patients. Relevant findings were as follows:

- At baseline, patients with breast cancer had lower overall quality-of-life scores (on the FACT: General, or FACT-G) than did controls.
- Mean FACT-G scores declined in patients postchemotherapy but remained stable in controls.
- Almost half of the patients experienced decline in cognitive function, compared with only 10% of controls.
- Predictors for decline on the overall FACT-Cog scale included lower reading scores, higher depression, and higher anxiety.
- Predictors for decline in specific subscales varied.

#### Neuropsychological tests of patients with early-stage colon cancer

Researchers administered formal neuropsychological tests to 81 patients with early-stage colon cancer who were scheduled to receive oxaliplatin, leucovorin, and fluorouracil . They conducted assessments prechemotherapy (n = 81), postchemotherapy (n = 73), and 6 months after the end of the last cycle of chemotherapy (n = 54).[17] Attention, visuomotor ability, executive function, verbal memory, and verbal learning were evaluated.

More than one-third of patients (37%) had cognitive impairment in processing speed and executive functioning before receiving chemotherapy. More than half of patients (56%) had a decline in verbal memory. At 6 months, 54% of patients had improved, but 33% had worsened. In an exploratory analysis, older age and fewer years of education were risk factors for cognitive impairment. Conversely, quality of life, anxiety, depression, or fatigue levels did not correlate with cognitive dysfunction.[17]

#### Neuropsychological tests of patients with early- and advanced-stage colon cancer

Longitudinal changes in neuropsychological test results and patient self-reported measures of cognitive symptoms (FACT-Cog version 2) were studied in a cohort of 362 patients with colorectal cancer (289 early-stage and 73 advanced-stage) who received chemotherapy (n = 173) or did not receive chemotherapy (n = 116). Results in these patients were compared with results in a control population of 72 participants.[18] Salient results included the following:

- Self-reported cognitive impairment was more common in patients who received chemotherapy (32%) than in those who did not receive chemotherapy (16%) or in controls (12.5%) (P = .007) at 6 months. There were no differences at 12 months.
- Patient self-reported cognitive impairment was moderately associated with fatigue, quality of life, and anxiety/depression.
- Correlation between neuropsychological test results and self-reported impairment was weak.
- Based on ICCTF criteria, cognitive impairment was present in approximately 50% of patients with colorectal cancer at baseline and 6 and 12 months later, compared with approximately 15% of controls.
- There were no differences between patients who had or had not received chemotherapy.

#### Neuropsychological tests of men with prostate cancer receiving ADT

Investigators studied 58 men with prostate cancer who received ADT at baseline and 6 and 12 months later. They compared their results to those of age-matched and education-level–matched patients with prostate cancer who did not receive ADT (n = 88) and men without prostate cancer (n = 84).[19] The groups were similar at baseline, but at 6 and 12 months, ADT-treated men were more likely to have impaired cognitive performance according to ICCTF criteria, which combine results from individual tests. Rates of impaired cognitive performance on individual tests, however, were not significantly different at 12 months between ADT-treated patients and controls. The following factors did not moderate the effect of ADT on cognitive performance:

- Age.
- Cognitive reserve.
- Depressive symptoms.
- Fatigue.
- Hot flashes.

#### Neuropsychological tests of allogeneic stem cell transplant (SCT) recipients

Researchers tested 102 transplant recipients before and at 12 months after SCT.[20] They used a battery of 14 tests to assess the following cognitive domains:

- Verbal working memory/fluency.
- Fine motor function.
- Visuospatial working memory.
- Verbal learning and retrieval.
- Reaction time.

The investigators chose to report the frequency of below-normal test scores for individual tests rather than define domain-specific performance, so comparison with other studies is not possible.[20]

Some evidence of impairment in at least one domain was present in 47% of patients at baseline and 41% of patients at follow-up. Age and premorbid intelligence level were associated with performance. Finally, 16% of patients demonstrated a decline in cognitive function.[20]

### References

Wefel JS, Vardy J, Ahles T, et al.: International Cognition and Cancer Task Force recommendations to harmonise studies of cognitive function in patients with cancer. Lancet Oncol 12 (7): 703-8, 2011.21354373
Joly F, Giffard B, Rigal O, et al.: Impact of Cancer and Its Treatments on Cognitive Function: Advances in Research From the Paris International Cognition and Cancer Task Force Symposium and Update Since 2012. J Pain Symptom Manage 50 (6): 830-41, 2015.26344551
Pullens MJ, De Vries J, Roukema JA: Subjective cognitive dysfunction in breast cancer patients: a systematic review. Psychooncology 19 (11): 1127-38, 2010.20020424
Gutenkunst SL, Vardy JL, Dhillon HM, et al.: Correlates of cognitive impairment in adult cancer survivors who have received chemotherapy and report cognitive problems. Support Care Cancer 29 (3): 1377-1386, 2021.32666213
Hutchinson AD, Hosking JR, Kichenadasse G, et al.: Objective and subjective cognitive impairment following chemotherapy for cancer: a systematic review. Cancer Treat Rev 38 (7): 926-34, 2012.22658913
Jim HS, Phillips KM, Chait S, et al.: Meta-analysis of cognitive functioning in breast cancer survivors previously treated with standard-dose chemotherapy. J Clin Oncol 30 (29): 3578-87, 2012.22927526
Hodgson KD, Hutchinson AD, Wilson CJ, et al.: A meta-analysis of the effects of chemotherapy on cognition in patients with cancer. Cancer Treat Rev 39 (3): 297-304, 2013.23219452
Bakoyiannis I, Tsigka EA, Perrea D, et al.: The Impact of Endocrine Therapy on Cognitive Functions of Breast Cancer Patients: A Systematic Review. Clin Drug Investig 36 (2): 109-18, 2016.26619839
Wagner LI, Gray RJ, Sparano JA, et al.: Patient-Reported Cognitive Impairment Among Women With Early Breast Cancer Randomly Assigned to Endocrine Therapy Alone Versus Chemoendocrine Therapy: Results From TAILORx. J Clin Oncol 38 (17): 1875-1886, 2020.32271671
Lee Meeuw Kjoe PR, Kieffer JM, Small BJ, et al.: Effects of tamoxifen and exemestane on cognitive function in postmenopausal patients with breast cancer. JNCI Cancer Spectr 7 (2): , 2023.37004168
McGinty HL, Phillips KM, Jim HS, et al.: Cognitive functioning in men receiving androgen deprivation therapy for prostate cancer: a systematic review and meta-analysis. Support Care Cancer 22 (8): 2271-80, 2014.24859915
Ahles TA, Saykin AJ, McDonald BC, et al.: Longitudinal assessment of cognitive changes associated with adjuvant treatment for breast cancer: impact of age and cognitive reserve. J Clin Oncol 28 (29): 4434-40, 2010.20837957
Whalley LJ, Deary IJ, Appleton CL, et al.: Cognitive reserve and the neurobiology of cognitive aging. Ageing Res Rev 3 (4): 369-82, 2004.15541707
Collins B, MacKenzie J, Tasca GA, et al.: Cognitive effects of chemotherapy in breast cancer patients: a dose-response study. Psychooncology 22 (7): 1517-27, 2013.22936651
Pullens MJ, De Vries J, Van Warmerdam LJ, et al.: Chemotherapy and cognitive complaints in women with breast cancer. Psychooncology 22 (8): 1783-9, 2013.23109296
Janelsins MC, Heckler CE, Peppone LJ, et al.: Cognitive Complaints in Survivors of Breast Cancer After Chemotherapy Compared With Age-Matched Controls: An Analysis From a Nationwide, Multicenter, Prospective Longitudinal Study. J Clin Oncol 35 (5): 506-514, 2017.28029304
Cruzado JA, López-Santiago S, Martínez-Marín V, et al.: Longitudinal study of cognitive dysfunctions induced by adjuvant chemotherapy in colon cancer patients. Support Care Cancer 22 (7): 1815-23, 2014.24535240
Vardy JL, Dhillon HM, Pond GR, et al.: Cognitive Function in Patients With Colorectal Cancer Who Do and Do Not Receive Chemotherapy: A Prospective, Longitudinal, Controlled Study. J Clin Oncol 33 (34): 4085-92, 2015.26527785
Gonzalez BD, Jim HS, Booth-Jones M, et al.: Course and Predictors of Cognitive Function in Patients With Prostate Cancer Receiving Androgen-Deprivation Therapy: A Controlled Comparison. J Clin Oncol 33 (18): 2021-7, 2015.25964245
Scherwath A, Schirmer L, Kruse M, et al.: Cognitive functioning in allogeneic hematopoietic stem cell transplantation recipients and its medical correlates: a prospective multicenter study. Psychooncology 22 (7): 1509-16, 2013.22945857

## Interventions for Cognitive Impairment

### Nonpharmacological Interventions

Evidence-based interventions to manage cognitive impairment in cancer patients and survivors have not been firmly established. Several nonpharmacological approaches have shown promise, including the following:[1]

- Cognitive rehabilitation.
- Exercise and physical activity.
- Psychosocial interventions such as attention-restoring activities and meditation.

All of the interventions in Table 1 have shown some evidence of efficacy but remain active areas of investigation.

Table 1. Nonpharmacological Interventions for Cognitive Impairment

Intervention | Dose | Comments | References
Cognitive rehabilitation | 4–96 h | Multiple RCTs and non-RCTs showed improvement in some components of subjective/objective cognition. | Positive results: [2-13]
Included psychoeducation, compensatory training, and cognitive training. | 4–96 h | 1 RCT and 2 non-RCTs showed no benefit. | Positive results: [2-13]
Included psychoeducation, compensatory training, and cognitive training. | 4–96 h | Most RCTs had small samples (<50 participants). | Negative results: [14-16]
Included psychoeducation, compensatory training, and cognitive training. | 4–96 h | Wide variation in components of intervention, dose, and measures. | Negative results: [14-16]
Exercise and physical activity | 6–65 h | Several small RCTs and non-RCTs showed improvement in some components of subjective/objective cognition. | Positive results: [17][Level of evidence: I];[2,18-22]
Included various types of exercise, yoga, qigong, and tai chi. | 6–65 h | 2 studies showed no benefit. | Positive results: [17][Level of evidence: I];[2,18-22]
Included various types of exercise, yoga, qigong, and tai chi. | 6–65 h | Wide variation in type of movement therapy, dose, and measures. | Negative results: [23,24]
Attention restoration and meditation | 12–22 h | 2 large RCTs and 3 small RCTs showed improvement in some components of subjective/objective cognition. | Positive results: [25-29]
All therapies involved quiet, focused attention in the present moment. | 12–22 h | 2 large RCTs and 3 small RCTs showed improvement in some components of subjective/objective cognition. | Positive results: [25-29]

RCT = randomized controlled trial.

#### Cognitive rehabilitation

Cognitive rehabilitation has shown promise in reducing the impact of cognitive problems on cancer patients and survivors. This approach originated to treat people with brain injuries such as stroke or traumatic brain injury, and it has been adapted for the cancer setting.[30] Several rehabilitation approaches have been blended to varying degrees, including the following:

- Psychoeducation provides useful information about brain functioning, cognitive deficits, and their consequences for daily life.[4]
- Compensatory training focuses on the acquisition of new behaviors and strategies to compensate for chronic dysfunction. This intervention may include modifying or restructuring the environment by substituting external aids (such as calendars and electronic diaries) so that individuals rely less on their cognitive abilities. It may involve learning new coping strategies (such as pacing cognitive activities and minimizing distractions).[8]
- Cognitive training involves the use of repetitive, increasingly challenging tasks (often via computer) to improve, maintain, or restore cognitive function in the areas of attention, memory, and executive function.[9,13,31]

The modest evidence for the efficacy of cognitive rehabilitation is based on several randomized controlled trials that used a diverse group of objective tests of neuropsychological function and subjective measures of cognitive impairment.[6-9,11] Cognitive rehabilitation intervention groups showed greater improvement than controls in self-reported cognitive impairment [6,7] and objective neuropsychological measures of attention,[6] memory,[7,8,11] and processing speed.[11] Other cognitive rehabilitation intervention studies provided similar results but were limited by partial or no randomization,[5,14] one-group design,[3,4] or secondary analysis.[10]

#### Exercise and physical activity

There is increasing interest in physical activity and mind-body exercise to address cognitive impairment in cancer survivors.[18,20,23,32] A systematic review of randomized controlled trials using exercise to address cognitive function in cancer survivors identified 29 potentially relevant trials that were published through 2018. Of these trials, 12 (41%) found benefit in perceived cognitive function. In addition, 3 of the 10 studies (30%) that objectively measured cognitive function found some benefit. A number of limitations in these trials were noted; the type of physical exercise varied, and cognitive function was often not the primary outcome of interest.[33]

In one multicenter randomized clinical trial, 181 breast cancer survivors who had received neoadjuvant or adjuvant chemotherapy reported cognitive problems, which were confirmed by lower-than-expected performance on neuropsychological testing. Participants were randomly assigned to an exercise group or a control group.[34][Level of evidence: I] The 6-month exercise intervention consisted of supervised aerobic exercise and strength training (2 h/wk) and Nordic/power walking (2 h/wk). Notably, two-thirds of the participants attended 80% or more of the exercise sessions, and physical fitness significantly improved for participants in the exercise group, compared with participants in the control group (peak oxygen uptake, 1.4 mL/min/kg, 95% confidence interval, 0.6–2.2). No difference was seen in the primary outcome of memory. However, significant beneficial effects were found for self-reported cognitive functioning, fatigue, quality of life, and depression. In addition, subgroup analysis indicated a positive effect of exercise on tested cognitive functioning in highly fatigued patients.

Similarly, the Exercise Program in Cancer and Cognition Study was a randomized controlled trial designed to determine whether 6 months of 150 minutes or more per week of moderate-intensity aerobic exercise, compared with usual-care control, improved neurocognitive function in 153 women with breast cancer receiving endocrine therapy.[17][Level of evidence: I] Primary outcomes, assessed before baseline and within 2 weeks postintervention, included objective cognitive performance tests of processing speed, learning and memory, verbal memory, and working memory. Secondary outcomes included performance on cognitive tests of attention, executive function, and mental flexibility. Adherence to the exercise intervention was high, with 70.13% of participants who were at least 80% adherent, 67.33% who were at least 90% adherent, and 55.84% who were 100% adherent. However, cardiorespiratory fitness did not differ significantly between treatment groups from baseline to postintervention. Improvements in processing speed were noted for the exercise group compared with the usual-care group, with a significant group-by-time interaction (P = .041) and a trend for the main effect of time (P = .11) for processing speed and no change in the controls. Improvements in processing speed were associated with better intervention adherence (P = .017). In addition, younger women (aged ≤60 years) had a trend for greater processing speed improvements (P = .06), while those with a lower educational level (≤16 years of education) had a significantly greater improvement in processing speed (P = .03).

A randomized controlled trial of qigong—a set of coordinated gentle exercises, meditation, and breathing—demonstrated improved self-reported cognitive impairment in cancer survivors after chemotherapy.[20] Other movement studies used one-group designs,[23] were not randomized,[22] or were secondary analyses.[19,24]

#### Attention restoration

An intervention focused specifically on restoring and maintaining the capacity to direct attention, actively focus, and concentrate—components of cognitive function—was developed and tested in breast cancer survivors.[25] The intervention consisted of exposure to the natural environment, including activities such as walking or sitting outdoors, tending plants or gardening, watching birds or other wildlife, and caring for pets. Participants contracted in writing to spend 120 minutes per week engaged in one or more of these activities. Neuropsychological tests of attention demonstrated greater improvement in the capacity to direct attention in the group that participated in attention-restoring activities than in the control group.[26]

#### Meditation

Mindfulness-based stress reduction (MBSR) is an integrative therapy that focuses on bringing attention and awareness to each moment in a nonjudgmental way. The benefits of MBSR have been evaluated in numerous studies of health conditions such as chronic pain, anxiety, and fibromyalgia.[27] A review of MBSR studies in cancer patients found only two randomized trials with positive results, despite a small sample size.[29,35] In one large, adequately powered, randomized trial in breast cancer survivors, the MBSR group showed more improvement in self-reported confusion than did the control group at the end of the intervention period, but there were no long-term effects.[27] No objective measures of cognitive function were used in this trial, and evidence of impairment was not a requirement for study eligibility.

A smaller study showed that MBSR participants experienced more positive effects on self-reported attention and working memory than did a control group. The finding was durable at 6 months.[29] An objective measure of accuracy also showed durable improvement in the MBSR group.

A randomized trial of Tibetan sound meditation demonstrated improvement in objective measures of memory, processing speed, and self-reported cognitive function.[28] Although the sample size was small, eligibility for the study required self-reported cognitive impairment.

### Pharmacological Interventions

Several classes of agents have been investigated as potential interventions for managing cognitive impairment. In general, the quality of study design, outcomes studied, and variations in doses and schedules of the agents prevent any firm conclusions. The agents, putative mechanisms of action, and summary of results are provided below and in Table 2.

- Psychostimulants: Approved by the U.S. Food and Drug Administration primarily for attention-deficit hyperactivity disorder or sleep-wake disorders, psychostimulants are generally well tolerated. These agents have been tested in individuals with drug- or cancer therapy–induced cognitive dysfunction with varying levels of other associated symptoms.[36-38] Seven phase II trials of different psychostimulants for treating cognitive impairment and associated symptoms were reviewed. Not all agents showed benefit; the symptoms most likely to improve were alertness, attention, and psychomotor speed. Six trials had control arms, and one reported results in a descriptive fashion. Also, some trials were in limited populations that may have had additional confounders such as individuals with central nervous system tumors, making results difficult to extrapolate to other patient groups.[37-39] Finally, the trials were underpowered, in part because of difficulty with enrollment.
- Erythropoietin-stimulating agents (ESAs): The hypothesized mechanism for ESAs in the improvement of cognitive function is the result of preclinical data demonstrating erythropoietin receptors in brain tissue providing a neuroprotective effect and preventing neuronal apoptosis. The potential for cognitive improvement must be weighed against the risks of ESAs, which include cardiovascular and thrombotic events, the potential for causing tumor progression, and decreases in overall survival.
- Acetylcholinesterase (AChE) inhibitors: Donepezil, an AChE inhibitor, is approved for Alzheimer disease. It is hypothesized that whole-brain radiation therapy (WBRT) causes neuronal injury that results in a decrease in acetylcholine. This theory is supported clinically by similarities between WBRT cognitive dysfunction and Alzheimer disease. The use of donepezil may increase acetylcholine levels in the brain.
  A large, multisite randomized controlled trial included 276 breast cancer survivors who were at a mean of 29.6 months (standard deviation = 14.2) postchemotherapy. Participants were assigned to receive either 5 mg of donepezil once daily for 6 weeks, titrated up to 10 mg once daily for 18 weeks (n = 140), or a placebo (n = 136).[40][Level of evidence: I] At 24 weeks, the treatment groups did not differ on memory scores (Hopkins Verbal Learning Test-Revised) (donepezil mean = 25.98, placebo = 26.50; P = .32). In addition, there were no statistically significant differences between treatment groups at 12, 24, or 36 weeks for attention, executive function, verbal fluency, processing speed, or self-reported cognitive functioning.
- N-methyl-D-aspartate (NMDA) receptor antagonists: By inhibiting the NMDA receptor with the antagonist memantine, radiation-induced neuronal stimulation and excitotoxicity may be reduced, preventing WBRT-induced cognitive decline. Memantine has not been studied for reducing cognitive dysfunction in cancer patients outside of the WBRT setting.

Table 2. Agents for Managing Cognitive Impairment

Agent | Dose | Comments
Psychostimulants
Methylphenidate | 10–30 mg/d for ≥2 d | Phase II studies with varying levels of benefits for different cognitive parameters (alertness, attention, memory, psychomotor speed, and executive function).
Methylphenidate | 10–30 mg/d for ≥2 d | Small trials, not always randomized, did not always meet accrual goals; results should be interpreted with caution.[36,37]; [39][Level of evidence: II]
D-methylphenidate | 5–10 mg bid | Small, underpowered, placebo-controlled experience showed no benefit in verbal learning.
D-methylphenidate | 5–10 mg bid | N = 57
D-methylphenidate | 5–10 mg bid | Placebo controlled.[41][Level of evidence: II]
Modafinil | 200–400 mg/d for 4 d–6 wk | Phase II studies with varied trial designs.
Modafinil | 200–400 mg/d for 4 d–6 wk | Benefit seen in psychomotor speed, memory, executive function, and attention, with largest study showing sustained benefit.[42][Level of evidence: II]
Modafinil | 200–400 mg/d for 4 d–6 wk | Interpret with caution: accrual problems, short study duration, and inadequate power.
Modafinil | 200–400 mg/d for 4 d–6 wk | No benefit seen in study in which patients served as their own controls.[37,38,43][Level of evidence: I]
ESAs
Erythropoietin | 40,000 U/wk | Multiple clinical trials demonstrated conflicting results; no intervention effect on improvement in subjective cognitive function.
Erythropoietin | 40,000 U/wk | Results difficult to generalize: varying assessment tools, small sample sizes, and differences in dosing and length of treatment.[44][Level of evidence: I]; [45][Level of evidence: I]; [46][Level of evidence: II]; [47][Level of evidence: II]; [48][Level of evidence: II]; [49]
AChE Inhibitors
Donepezil | 5 mg qd; may increase to 10 mg qd | Studied in patients 1–5 y postchemotherapy and >6 mo post-WBRT.
Donepezil | 5 mg qd; may increase to 10 mg qd | Mixed results of no treatment effect and some improvement in some measures of attention, concentration, and memory in each trial.[50][Level of evidence: I]; [51][Level of evidence: I]; [52][Level of evidence: II]; [40][Level of evidence: I]
NMDA Receptor Antagonists
Memantine | 20 mg qd | One RCT; primary endpoint of improvement in delayed recall not statistically significant.
Memantine | 20 mg qd | Treatment resulted in better cognitive function over time; delayed time to cognitive decline; and reduced rate of decline in memory, executive function, and processing speed.[53]

AChE = acetylcholinesterase; bid = twice a day; ESA = erythropoietin-stimulating agent; NMDA = N-methyl-D-aspartate; qd = every day; RCT = randomized controlled trial; WBRT = whole-brain radiation therapy.

### References

Von Ah D: Cognitive changes associated with cancer and cancer treatment: state of the science. Clin J Oncol Nurs 19 (1): 47-56, 2015.25689649
Korstjens I, Mesters I, van der Peet E, et al.: Quality of life of cancer survivors after physical and psychosocial rehabilitation. Eur J Cancer Prev 15 (6): 541-7, 2006.17106335
Ercoli LM, Castellon SA, Hunter AM, et al.: Assessment of the feasibility of a rehabilitation intervention program for breast cancer survivors with cognitive complaints. Brain Imaging Behav 7 (4): 543-53, 2013.23955490
Ferguson RJ, Ahles TA, Saykin AJ, et al.: Cognitive-behavioral management of chemotherapy-related cognitive change. Psychooncology 16 (8): 772-7, 2007.17152119
Schuurs A, Green HJ: A feasibility study of group cognitive rehabilitation for cancer survivors: enhancing cognitive function and quality of life. Psychooncology 22 (5): 1043-9, 2013.22570263
Cherrier MM, Anderson K, David D, et al.: A randomized trial of cognitive rehabilitation in cancer survivors. Life Sci 93 (17): 617-22, 2013.24012579
Ercoli LM, Petersen L, Hunter AM, et al.: Cognitive rehabilitation group intervention for breast cancer survivors: results of a randomized clinical trial. Psychooncology 24 (11): 1360-7, 2015.25759235
Ferguson RJ, McDonald BC, Rocque MA, et al.: Development of CBT for chemotherapy-related cognitive change: results of a waitlist control trial. Psychooncology 21 (2): 176-86, 2012.22271538
Kesler S, Hadi Hosseini SM, Heckler C, et al.: Cognitive training for improving executive function in chemotherapy-treated breast cancer survivors. Clin Breast Cancer 13 (4): 299-306, 2013.23647804
McDougall GJ, Becker H, Acee TW, et al.: Symptom management of affective and cognitive disturbance with a group of cancer survivors. Arch Psychiatr Nurs 25 (1): 24-35, 2011.21251599
Von Ah D, Carpenter JS, Saykin A, et al.: Advanced cognitive training for breast cancer survivors: a randomized controlled trial. Breast Cancer Res Treat 135 (3): 799-809, 2012.22918524
McDougall GJ: Memory improvement program for elderly cancer survivors. Geriatr Nurs 22 (4): 185-90, 2001 Jul-Aug.11505244
Bray VJ, Dhillon HM, Bell ML, et al.: Evaluation of a Web-Based Cognitive Rehabilitation Program in Cancer Survivors Reporting Cognitive Symptoms After Chemotherapy. J Clin Oncol 35 (2): 217-225, 2017.28056205
Poppelreuter M, Weis J, Bartsch HH: Effects of specific neuropsychological training programs for breast cancer patients after adjuvant chemotherapy. J Psychosoc Oncol 27 (2): 274-96, 2009.19337933
Poppelreuter M, Weis J, Mumm A, et al.: Rehabilitation of therapy-related cognitive deficits in patients after hematopoietic stem cell transplantation. Bone Marrow Transplant 41 (1): 79-90, 2008.17934527
Rottmann N, Dalton SO, Bidstrup PE, et al.: No improvement in distress and quality of life following psychosocial cancer rehabilitation. A randomised trial. Psychooncology 21 (5): 505-14, 2012.21308859
Bender CM, Sereika SM, Gentry AL, et al.: Effects of aerobic exercise on neurocognitive function in postmenopausal women receiving endocrine therapy for breast cancer: The Exercise Program in Cancer and Cognition randomized controlled trial. Psychooncology 33 (2): , 2024.38911475
Reid-Arndt SA, Matsuda S, Cox CR: Tai Chi effects on neuropsychological, emotional, and physical functioning following cancer treatment: a pilot study. Complement Ther Clin Pract 18 (1): 26-30, 2012.22196570
Derry HM, Jaremka LM, Bennett JM, et al.: Yoga and self-reported cognitive problems in breast cancer survivors: a randomized controlled trial. Psychooncology 24 (8): 958-66, 2015.25336068
Oh B, Butow PN, Mullan BA, et al.: Effect of medical Qigong on cognitive function, quality of life, and a biomarker of inflammation in cancer patients: a randomized controlled trial. Support Care Cancer 20 (6): 1235-42, 2012.21688163
Schmidt T, Weisser B, Dürkop J, et al.: Comparing Endurance and Resistance Training with Standard Care during Chemotherapy for Patients with Primary Breast Cancer. Anticancer Res 35 (10): 5623-9, 2015.26408735
Baumann FT, Drosselmeyer N, Leskaroski A, et al.: 12-week resistance training with breast cancer patients during chemotherapy: effects on cognitive abilities. Breast Care (Basel) 6 (2): 142-3, 2011.
Schwartz AL, Thompson JA, Masood N: Interferon-induced fatigue in patients with melanoma: a pilot study of exercise and methylphenidate. Oncol Nurs Forum 29 (7): E85-90, 2002.12183762
Schmidt ME, Wiskemann J, Armbrust P, et al.: Effects of resistance exercise on fatigue and quality of life in breast cancer patients undergoing adjuvant chemotherapy: A randomized controlled trial. Int J Cancer 137 (2): 471-80, 2015.25484317
Cimprich B: Development of an intervention to restore attention in cancer patients. Cancer Nurs 16 (2): 83-92, 1993.8477404
Cimprich B, Ronis DL: An environmental intervention to restore attention in women with newly diagnosed breast cancer. Cancer Nurs 26 (4): 284-92; quiz 293-4, 2003.12886119
Hoffman CJ, Ersser SJ, Hopkinson JB, et al.: Effectiveness of mindfulness-based stress reduction in mood, breast- and endocrine-related quality of life, and well-being in stage 0 to III breast cancer: a randomized, controlled trial. J Clin Oncol 30 (12): 1335-42, 2012.22430268
Milbury K, Chaoul A, Biegler K, et al.: Tibetan sound meditation for cognitive dysfunction: results of a randomized controlled pilot trial. Psychooncology 22 (10): 2354-63, 2013.23657969
Johns SA, Von Ah D, Brown LF, et al.: Randomized controlled pilot trial of mindfulness-based stress reduction for breast and colorectal cancer survivors: effects on cancer-related cognitive impairment. J Cancer Surviv 10 (3): 437-48, 2016.26586494
Cicerone KD, Dahlberg C, Malec JF, et al.: Evidence-based cognitive rehabilitation: updated review of the literature from 1998 through 2002. Arch Phys Med Rehabil 86 (8): 1681-92, 2005.16084827
Von Ah D, Jansen C, Allen DH, et al.: Putting evidence into practice: evidence-based interventions for cancer and cancer treatment-related cognitive impairment. Clin J Oncol Nurs 15 (6): 607-15, 2011.22119972
Lee CE, Kilgour A, Lau YK: Efficacy of walking exercise in promoting cognitive-psychosocial functions in men with prostate cancer receiving androgen deprivation therapy. BMC Cancer 12: 324, 2012.22846379
Campbell KL, Zadravec K, Bland KA, et al.: The Effect of Exercise on Cancer-Related Cognitive Impairment and Applications for Physical Therapy: Systematic Review of Randomized Controlled Trials. Phys Ther 100 (3): 523-542, 2020.32065236
Koevoets EW, Schagen SB, de Ruiter MB, et al.: Effect of physical exercise on cognitive function after chemotherapy in patients with breast cancer: a randomized controlled trial (PAM study). Breast Cancer Res 24 (1): 36, 2022.35619188
Shennan C, Payne S, Fenlon D: What is the evidence for the use of mindfulness-based interventions in cancer care? A review. Psychooncology 20 (7): 681-97, 2011.20690112
Bruera E, Miller MJ, Macmillan K, et al.: Neuropsychological effects of methylphenidate in patients receiving a continuous infusion of narcotics for cancer pain. Pain 48 (2): 163-6, 1992.1589233 92270272
Gehring K, Patwardhan SY, Collins R, et al.: A randomized trial on the efficacy of methylphenidate and modafinil for improving cognitive functioning and symptoms in patients with a primary brain tumor. J Neurooncol 107 (1): 165-74, 2012.21964738
Boele FW, Douw L, de Groot M, et al.: The effect of modafinil on fatigue, cognitive functioning, and mood in primary brain tumor patients: a multicenter randomized controlled trial. Neuro Oncol 15 (10): 1420-8, 2013.23925452
Meyers CA, Weitzner MA, Valentine AD, et al.: Methylphenidate therapy improves cognition, mood, and function of brain tumor patients. J Clin Oncol 16 (7): 2522-7, 1998.9667273
Rapp SR, Dressler EV, Brown WM, et al.: Phase III Randomized, Placebo-Controlled Clinical Trial of Donepezil for Treatment of Cognitive Impairment in Breast Cancer Survivors After Adjuvant Chemotherapy (WF-97116). J Clin Oncol 42 (21): 2546-2557, 2024.38709986
Mar Fan HG, Clemons M, Xu W, et al.: A randomised, placebo-controlled, double-blind trial of the effects of d-methylphenidate on fatigue and cognitive dysfunction in women undergoing adjuvant chemotherapy for breast cancer. Support Care Cancer 16 (6): 577-83, 2008.17972110
Kohli S, Fisher SG, Tra Y, et al.: The effect of modafinil on cognitive function in breast cancer survivors. Cancer 115 (12): 2605-16, 2009.19309747
Lundorff LE, Jønsson BH, Sjøgren P: Modafinil for attentional and psychomotor dysfunction in advanced cancer: a double-blind, randomised, cross-over trial. Palliat Med 23 (8): 731-8, 2009.19648224
Chang J, Couture FA, Young SD, et al.: Weekly administration of epoetin alfa improves cognition and quality of life in patients with breast cancer receiving chemotherapy. Support Cancer Ther 2 (1): 52-8, 2004.18628159
O'Shaughnessy JA, Vukelja SJ, Holmes FA, et al.: Feasibility of quantifying the effects of epoetin alfa therapy on cognitive function in women with breast cancer undergoing adjuvant or neoadjuvant chemotherapy. Clin Breast Cancer 5 (6): 439-46, 2005.15748464
Iconomou G, Koutras A, Karaivazoglou K, et al.: Effect of epoetin alpha therapy on cognitive function in anaemic patients with solid tumours undergoing chemotherapy. Eur J Cancer Care (Engl) 17 (6): 535-41, 2008.18707621
Fan HG, Park A, Xu W, et al.: The influence of erythropoietin on cognitive function in women following chemotherapy for breast cancer. Psychooncology 18 (2): 156-61, 2009.18561284
Massa E, Madeddu C, Lusso MR, et al.: Evaluation of the effectiveness of treatment with erythropoietin on anemia, cognitive functioning and functions studied by comprehensive geriatric assessment in elderly cancer patients with anemia related to cancer chemotherapy. Crit Rev Oncol Hematol 57 (2): 175-82, 2006.16213740
O'Shaughnessy JA: Effects of epoetin alfa on cognitive function, mood, asthenia, and quality of life in women with breast cancer undergoing adjuvant chemotherapy. Clin Breast Cancer 3 (Suppl 3): S116-20, 2002.12533272
Lawrence JA, Griffin L, Balcueva EP, et al.: A study of donepezil in female breast cancer survivors with self-reported cognitive dysfunction 1 to 5 years following adjuvant chemotherapy. J Cancer Surviv 10 (1): 176-84, 2016.26130292
Rapp SR, Case LD, Peiffer A, et al.: Donepezil for Irradiated Brain Tumor Survivors: A Phase III Randomized Placebo-Controlled Clinical Trial. J Clin Oncol 33 (15): 1653-9, 2015.25897156
Shaw EG, Rosdhal R, D'Agostino RB, et al.: Phase II study of donepezil in irradiated brain tumor patients: effect on cognitive function, mood, and quality of life. J Clin Oncol 24 (9): 1415-20, 2006.16549835
Brown PD, Pugh S, Laack NN, et al.: Memantine for the prevention of cognitive dysfunction in patients receiving whole-brain radiotherapy: a randomized, double-blind, placebo-controlled trial. Neuro Oncol 15 (10): 1429-37, 2013.23956241

## Latest Updates to This Summary (11/07/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Interventions for Cognitive Impairment

Revised Table 1, Nonpharmacological Interventions for Cognitive Impairment, to include information about exercise and physical activity (cited Bender et al. as reference 17 and level of evidence I).

Added text about the results of the Exercise Program in Cancer and Cognition Study, a randomized controlled trial designed to determine whether 6 months of 150 minutes or more per week of moderate-intensity aerobic exercise, compared with usual-care controls, improved neurocognitive function in women with breast cancer receiving endocrine therapy.

Added text about the results of a large, multisite randomized clinical trial, in which breast cancer survivors who were at a mean of 29.6 months postchemotherapy were assigned to receive either 5 mg of donepezil once daily for 6 weeks, titrated up to 10 mg once daily for 18 weeks, or a placebo (cited Rapp et al. as reference 40 and level of evidence I).

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about expert-reviewed information summary about causes and management of cognitive impairment in adults with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Cognitive Impairment in Adults With Cancer are:

- Larry D. Cripe, MD (Indiana University School of Medicine)
- Diane Von Ah, PhD, RN, FAAN (The Ohio State University)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Cognitive Impairment in Adults With Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/memory/cognitive-impairment-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 29112351]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).